# Aromatherapy With Essential Oils (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of aromatherapy with essential oils in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

- Aromatherapy is the use of essential oils from plants (flowers, herbs, or trees) as therapy to improve physical, mental, and spiritual well-being (see Question 1).
- Aromatherapy may be used with other complementary treatments, such as massage or acupuncture, as well as with standard medical treatments to manage symptoms caused by cancer or cancer treatment (see Question 1).
- Essential oils are most often used by inhaling them or by applying a diluted form of them to the skin (see Question 2).
- Aromatherapy research with cancer patients has studied the effect of essential oils on anxiety, nausea, vomiting, and other health-related conditions (see Question 4).
- Safety testing on essential oils has found very few side effects. Lavender and tea tree essential oils have been found to have some hormone-like effects (see Question 5).
- Aromatherapy products do not need approval by the U.S. Food and Drug Administration (FDA) (see Question 6).

## Questions and Answers About Aromatherapy

1. What is aromatherapy?
  Aromatherapy is the use of essential oils from plants to improve the mind, body, and spirit. It is used by patients with cancer to improve quality of life and reduce stress, anxiety, pain, nausea, and vomiting caused by cancer and its treatment. Aromatherapy is often used with other complementary treatments like massage therapy and acupuncture, as well as with standard medical treatments, for symptom management.
  Essential oils are the fragrant (aromatic) part found in many plants, often under the surface of leaves, bark, or peel. The fragrance is released if the plant is crushed or a special steam process is used.
  There are many essential oils used in aromatherapy, including those from Roman chamomile, geranium, lavender, tea tree, lemon, ginger, cedarwood, and bergamot. Each plant's essential oil has a different chemical make-up that affects how it smells, how it is absorbed, and how it affects the body.
  Essential oils are very concentrated. For example, it takes about 220 pounds of lavender flowers to make about 1 pound of essential oil. The aroma of essential oils fades away quickly when left open to air.
  The chemical compounds in essential oils can change as they get older. Many essential oils do not have an expiration date.
2. How is aromatherapy given or taken?
  Aromatherapy is used in several ways.
  - Indirect inhalation: The patient breathes in an essential oil by using a room diffuser, which spreads the essential oil through the air, or by placing drops on a tissue or piece of cotton nearby.
  - Direct inhalation: The patient breathes in an essential oil by using an individual inhaler made by floating essential oil drops on top of hot water.
  - Massage: In aromatherapy massage, one or more essential oils is diluted into a carrier oil and massaged into the skin.
  Essential oils may also be mixed with bath salts and lotions or applied to bandages.
  There are some essential oils used to treat specific conditions. However, the types of essential oils used and the ways they are combined vary, depending on the experience and training of the aromatherapist.
3. Have any preclinical (laboratory or animal) studies been done using aromatherapy?
  In laboratory studies, tumor cells are used to test a substance to find out if it is likely to have any anticancer effects. In animal studies, tests are done to see if a drug, procedure, or treatment is safe and effective in animals. Laboratory and animal studies are done before a substance is tested in people.
  Laboratory and animal studies have tested the effects of essential oils. For information on laboratory and animal studies done using essential oils, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Aromatherapy With Essential Oils.
4. Have any clinical trials (research studies with people) of aromatherapy been done?
  Clinical trials of aromatherapy have studied its use in the treatment of anxiety, nausea, vomiting, and other health-related conditions in cancer patients. No studies of aromatherapy used to treat cancer have been published in a peer-reviewed scientific journal.
  Studies of aromatherapy have shown mixed results. There have been some reports of improved mood, anxiety, sleep, nausea, and pain. Other studies reported that aromatherapy showed no change in symptoms.
  Studies on anxiety and depression
  - A trial of 103 cancer patients studied the effects of massage compared to massage with Roman chamomile essential oil. Two weeks later, a decrease in anxiety and improved symptoms were noted in the group that had massage with essential oil. The group that had massage only did not have the same benefit.
  - Another study of 58 patients with various cancers who completed six aromatherapy sessions showed a decrease in anxiety and depression compared with before the sessions began.
  - A randomized controlled trial studied the effects of inhalation aromatherapy on anxiety during radiation therapy. There were 313 patients randomly assigned to either lavender, bergamot, or cedarwood essential oils. There were no differences reported in depression or anxiety between the groups.
  Study on sleep
  - Newly diagnosed patients with acute myeloid leukemia who were hospitalized to receive intensive chemotherapy inhaled an essential oil through a diffuser overnight for 3 weeks. Patients were given the choice of lavender, peppermint, or chamomile. Improvement was reported in sleep, tiredness, drowsiness, lack of appetite, depression, anxiety, and well-being.
  Study on dry mouth
  - Radioactive iodine may cause damage to salivary glands. Increased saliva production during treatment may decrease damage to salivary glands. In a randomized controlled trial, patients who inhaled a mixture of lemon and ginger essential oils had increased saliva production compared with the placebo group.
  Studies on nausea and vomiting
  - A study of inhaled ginger essential oil in women receiving chemotherapy for breast cancer somewhat decreased acute nausea, but did not lessen vomiting or chronic nausea.
  - In a study of adult patients at the time of stem cell infusion, tasting or sniffing sliced oranges was more effective at reducing nausea, retching, and coughing than inhaling an orange essential oil.
  Study on aromatherapy in children
  Aromatherapy is used or claimed to be useful for a variety of childhood symptoms and conditions. When used safely, aromatherapy can help children feel calmer and sleep better.
  - A study of aromatherapy inhaled by children and adolescents undergoing stem cell transplant infusions compared essential oil from the peel of bergamot (a type of orange from trees grown in Italy) with a pleasant-smelling shampoo that did not contain essential oils. Bergamot oil is used in aromatherapy to relieve depression, anxiety, and poor digestion. The placebo-controlled, double-blind, randomized trial in 37 children and adolescents found that aromatherapy was not effective in reducing nausea, anxiety, or pain.
  Studies on procedure-related symptoms
  - Women having breast biopsies were randomly assigned to receive lavender-sandalwood or orange-peppermint essential oil drops placed on a felt tab and attached to their hospital gown or to no scent on the felt tab. Women who received the lavender-sandalwood aromatherapy tab had less anxiety than women who received the orange-peppermint aromatherapy tab or no scent tab.
  - In a study of inhaled lavender essential oil, eucalyptus essential oil, or no essential oil in cancer patients having needles inserted into a central venous port catheter, patients who inhaled lavender essential oil reported less pain.
  - A randomized controlled trial compared aromatherapy, music therapy, a combination of both, or a placebo in women with breast cancer before and after they had a mastectomy. The aromatherapy group received a mixture of lavender, bergamot, and geranium essential oils, while the music group was given a choice of music styles. The combination of treatments was found to be more effective in lessening pain and anxiety than either treatment alone.
5. Have any side effects or risks been reported from aromatherapy?
  Safety testing on essential oils shows very few side effects or risks when they are used as directed. Most essential oils have been approved as ingredients in food and fragrances and are labeled as GRAS (generally recognized as safe) by the U.S. Food and Drug Administration (FDA). Swallowing large amounts of essential oils is not recommended.
  Allergic reactions and skin irritation may occur when essential oils are in contact with the skin for long periods of time. Sun sensitivity may occur when citrus or other essential oils are applied to the skin before going out in the sun.
  Lavender and tea tree essential oils have been found to have effects similar to estrogen (female sex hormone) and also block or decrease the effect of androgens (male sex hormones). Applying lavender and tea tree essential oils to the skin over a long period of time was linked in one study to breast growth in boys who had not yet reached puberty.
6. Is aromatherapy approved by the FDA for use as a cancer treatment in the United States?
  Aromatherapy products do not need FDA approval.
  Aromatherapy is not regulated by state law, and there is no licensing required to practice aromatherapy in the United States. Practitioners often combine aromatherapy training with another field in which they are licensed, for example, massage therapy, nursing, acupuncture, or naturopathy.
  The National Association for Holistic Aromatherapy (www.naha.org) and the Alliance of International Aromatherapists (www.alliance-aromatherapists.org) are two organizations that have national educational standards for aromatherapists. A list of schools that offer certificate programs approved by NAHA can be found at https://naha.org/index.php/education/approved-schools/.
  The Canadian Federation of Aromatherapists (www.cfacanada.com) certifies aromatherapists in Canada. For a list of international aromatherapy programs, see the International Federation of Aromatherapists website (www.ifaroma.org/).

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of aromatherapy with essential oils in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Aromatherapy With Essential Oils. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/aromatherapy-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389261]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov